# Ewing Sarcoma Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood Ewing sarcoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Ewing Sarcoma

Key Points for This Section
- Ewing sarcoma is a type of cancer that forms from a certain kind of cell in bone or soft tissue.
- Undifferentiated small round cell sarcoma may also form in the bone or soft tissue.
- A genetic condition may increase the risk of Ewing sarcoma and other sarcomas.
- Symptoms of Ewing sarcoma include swelling and pain near the tumor.
- Tests that examine the bone and soft tissue are used to diagnose and stage Ewing sarcoma.
- Certain factors affect prognosis (chance of recovery).

### Ewing sarcoma is a type of cancer that forms from a certain kind of cell in bone or soft tissue.

Ewing sarcoma may form in the bones of the legs, arms, feet, hands, chest, pelvis, spine, or skull. It may also form in the body's soft tissues, which connect, support, and surround other body parts and organs.

Ewing sarcoma is most common in adolescents and young adults (teens through mid-20s).

Ewing sarcoma has also been called peripheral primitive neuroectodermal tumor, Askin tumor (Ewing sarcoma of the chest wall), extraosseous Ewing sarcoma (Ewing sarcoma in tissue other than bone), and Ewing sarcoma family of tumors.

### Undifferentiated small round cell sarcoma may also form in the bone or soft tissue.

Undifferentiated small round cell sarcoma usually forms in the bones or the muscles that are attached to bones and that help the body move. Undifferentiated small round cell sarcoma is usually treated the same way as Ewing sarcoma. Types of undifferentiated small round cell sarcomas include:

- Undifferentiated small round cell sarcoma with BCOR rearrangements. This type of round cell sarcoma usually forms in the pelvis, arms, or legs and may spread to other parts of the body. It is more common in children younger than 18 years. In this type of round cell sarcoma, the BCOR gene is joined to the CCNB3 gene or to other genes. To diagnose this round cell sarcoma, the tumor cells are checked for these gene changes.
- Undifferentiated small round cell sarcoma with CIC::DUX4 rearrangements. This type of round cell sarcoma usually forms in the trunk, arms, or legs. It is most common in males and in young adults. In this type of round cell sarcoma, the CIC gene is joined to the DUX4 gene. To diagnose this round cell sarcoma, the tumor cells are checked for this gene change.
- Undifferentiated small round cell sarcoma with CIC::NUTM1 rearrangements. This type of soft tissue tumor usually forms in the central nervous system, but it can also form in the trunk. It is most common in children about 6 years of age.
- Undifferentiated small round cell sarcoma with ATXN1::NUTM2A or ATXN1L::NUTM2A fusions. This type of soft tissue tumor has been found in three children. All were newborns or infants, and the cancer was in the central nervous system or peritoneum.
- Undifferentiated small round cell sarcoma with EWSR1::NFATC2 and FUS::NFATC2 rearrangements. This type of soft tissue tumor may be a benign cyst or a malignant (cancer) tumor. It usually forms in the arms and legs. The malignant tumor is more common in males and in adults.
- Undifferentiated small round cell sarcoma with EWSR1::PATZ1 fusions. This type of soft tissue tumor usually forms in the trunk and is more common in adults.

### A genetic condition may increase the risk of Ewing sarcoma and other sarcomas.

Ewing sarcoma is caused by certain changes to the way bone cells function, especially how they grow and divide into new cells. Often, the exact cause of these changes is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Not every child with a risk factor will develop Ewing sarcoma or other sarcomas. And they can develop in some children who don't have a known risk factor. Children with Fanconi anemia may be at increased risk of Ewing sarcoma. Talk with your child's doctor if you think your child may be at risk.

### Symptoms of Ewing sarcoma include swelling and pain near the tumor.

It's important to check with your child's doctor if your child has:

- a lump (which may feel soft and warm) in the arms, legs, chest, or pelvis
- pain and/or swelling near the lump
- fever for no known reason
- a bone that breaks for no known reason
- a limp when walking
- fatigue
- weight loss
- anemia
- shortness of breath
- back pain, weakness, numbness, or paralysis in the arms or legs

These symptoms may be caused by problems other than Ewing sarcoma. The only way to know is for your child to see a doctor.

### Tests that examine the bone and soft tissue are used to diagnose and stage Ewing sarcoma.

If your child has symptoms that suggest Ewing sarcoma, the doctor will need to find out if these are due to cancer or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They also will ask about your child's personal and family medical history and do a physical exam. Depending on these results, they may recommend other tests. If your child is diagnosed with Ewing sarcoma, the results of these tests will help you and your child's doctor plan treatment.

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. To plan treatment, it is important to know whether the cancer has spread to other parts of the body. Tests and procedures to detect, diagnose, and stage Ewing sarcoma are usually done at the same time.

The tests used to diagnose and stage Ewing sarcoma may include:

- MRI (magnetic resonance imaging) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the area where the tumor formed. This procedure is also called nuclear magnetic resonance imaging (NMRI).
  Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.
  Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the area where the tumor formed or the chest. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).
  Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
  Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
- PET-CT scan combines the pictures from a positron emission tomography scan (PET scan) and CT scan. The PET and CT scans are done at the same time on the same machine. The pictures from both scans are combined to make a more detailed picture than either test would make by itself. For the PET scan, a small amount of radioactive sugar (radioactive glucose) is injected into a vein. The scanner rotates around the body and makes a picture of where the sugar is being used in the body. Cancer cells show up brighter in the picture because they are more active and take up more sugar than normal cells do.
  Positron emission tomography (PET) scan. The child lies on a table that slides through the PET scanner. The head rest and white strap help the child lie still. A small amount of radioactive glucose (sugar) is injected into the child's vein, and a scanner makes a picture of where the glucose is being used in the body. Cancer cells show up brighter in the picture because they take up more glucose than normal cells do.
  Positron emission tomography (PET) scan; drawing shows a child lying on table that slides through the PET scanner.
- Bone scan checks if there are rapidly dividing cells, such as cancer cells, in the bone. A very small amount of radioactive material is injected into a vein and travels through the bloodstream. The radioactive material collects in the bones with cancer and is detected by a scanner.
  Bone scan. A small amount of radioactive material is injected into the child's vein and travels through the blood. The radioactive material collects in the bones. As the child lies on a table that slides under the scanner, the radioactive material is detected and images are made on a computer screen.
  Bone scan; drawing shows a child lying on a table that slides under the scanner, a technician operating the scanner, and a computer monitor that will show images made during the scan.
- Bone marrow aspiration and biopsy removes bone marrow and a small piece of bone by inserting a hollow needle into the hipbone. Samples are removed from both hipbones. A pathologist views the bone marrow and bone under a microscope to see if the cancer has spread. This test is only used if other tests have shown that the cancer may have spread from where it first formed.
  Bone marrow aspiration and biopsy. After a small area of skin is numbed, a bone marrow needle is inserted into the child’s hip bone. Samples of blood, bone, and bone marrow are removed for examination under a microscope.
  Bone marrow aspiration and biopsy; drawing shows a child lying face down on a table and a bone marrow needle being inserted into the right hip bone. An inset shows the bone marrow needle being inserted through the skin into the bone marrow of the hip bone.
- X-ray is a type of radiation that can go through the body and make pictures of areas inside the body, such as the chest or the area where the tumor formed.
- Complete blood count (CBC) checks a sample of blood for:
  - the number of red blood cells, white blood cells, and platelets
  - the amount of hemoglobin (the protein that carries oxygen) in the red blood cells
  - the portion of the blood sample made up of red blood cells
- Blood chemistry study uses a blood sample to measure the amounts of certain substances, such as lactate dehydrogenase (LDH), released into the blood by organs and tissues in the body. An unusual amount of a substance can be a sign of disease.
- Biopsy is a procedure in which a sample of tissue is removed from the tumor so that a pathologist can view it under a microscope to check for cancer. The following types of biopsies are used to check for Ewing sarcoma:
  - Incisional biopsy removes a sample of tissue through an incision in the skin.
  - Needle biopsy uses a needle to remove a sample of tissue.
  The child's pathologist, radiation oncologist, and surgeon usually work together to decide the best site to place the needle or biopsy incision. The selection of the biopsy site is important. A biopsy site that is not properly selected may result in more extensive surgery to remove the tumor or a larger area that is treated with radiation therapy.
  If there is a chance that the cancer has spread to nearby lymph nodes, one or more lymph nodes may be removed and checked for cancer.
  The following tests may be done on the tissue that is removed:
  - Cytogenetic analysis is a test in which the chromosomes of cells in a sample of tissue are counted and checked for any changes, such as broken, missing, rearranged, or extra chromosomes. Changes in certain chromosomes may be a sign of cancer. Cytogenetic analysis is used to help diagnose cancer, plan treatment, or find out how well treatment is working.
  - Immunohistochemistry is a test that uses antibodies to check for certain antigens (markers) in a sample of a patient's tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type.
  - Flow cytometry measures the number of cells in a sample, the percentage of live cells in a sample, and certain characteristics of the cells, such as size, shape, and the presence of tumor (or other) markers on the cell surface. The cells from a sample of a patient's blood, bone marrow, or other tissue are stained with a fluorescent dye, placed in a fluid, and then passed one at a time through a beam of light. The test results are based on how the cells that were stained with the fluorescent dye react to the beam of light.
  - Molecular test checks for certain genes, proteins, or other molecules in a sample of tissue, blood, or other body fluid. A molecular test may be done with other procedures, such as biopsies, to help diagnose some types of cancer. Molecular tests check for certain gene or chromosome changes that occur in some Ewing sarcomas.
  - Reverse transcription–polymerase chain reaction (RT–PCR) test measures the amount of a genetic substance called mRNA made by a specific gene. An enzyme called reverse transcriptase is used to convert a specific piece of RNA into a matching piece of DNA, which can be amplified (made in large numbers) by another enzyme called DNA polymerase. The amplified DNA copies help tell whether a specific mRNA is being made by a gene. RT–PCR can be used to check the activation of certain genes that may indicate the presence of cancer cells. This test may be used to look for certain changes in a gene or chromosome, which may help diagnose cancer.

### Certain factors affect prognosis (chance of recovery).

If your child has been diagnosed with Ewing sarcoma, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis. The factors that affect prognosis are different before and after treatment.

Before any treatment is given, prognosis depends on:

- whether the tumor has spread to lymph nodes or distant parts of the body
- where in the body the tumor started
- whether the tumor formed in the bone or in soft tissue
- how large the tumor is when the tumor is diagnosed
- whether the LDH level in the blood is higher than normal
- whether the tumor has certain gene changes
- whether tumor cells or DNA has been found in the blood
- your child's age
- your child's sex
- whether your child has had treatment for a different cancer
- whether the tumor has just been diagnosed or has come back

After treatment is given, prognosis is affected by:

- whether the tumor was completely removed by surgery
- whether the tumor responded to chemotherapy or radiation therapy

If the cancer recurs after initial treatment, prognosis depends on:

- whether the cancer came back more than two years after the initial treatment
- whether the cancer came back where it first formed and in other parts of the body, or whether the cancer came back in only one site

## Stages of Ewing Sarcoma

Key Points for This Section
- Ewing sarcoma is described as localized, metastatic, or recurrent.
  - Localized Ewing sarcoma
  - Metastatic Ewing sarcoma
  - Recurrent Ewing sarcoma

### Ewing sarcoma is described as localized, metastatic, or recurrent.

#### Localized Ewing sarcoma

The cancer is found in the bone or soft tissue where it began and may have spread to nearby tissue, including nearby lymph nodes.

#### Metastatic Ewing sarcoma

The cancer has spread from the bone or soft tissue where it began to other parts of the body. In Ewing sarcoma of bone, the cancer most often spreads to the lung, other bones, and bone marrow.

#### Recurrent Ewing sarcoma

The cancer has recurred (come back) after it has been treated. The cancer may come back in the bone or soft tissue where it began or in another part of the body.

## Treatment Option Overview

Key Points for This Section
- Children with Ewing sarcoma should have their treatment planned by a team of health care providers who are experts in treating cancer in children.
- There are different types of treatment for children with Ewing sarcoma.
- The following types of treatment are used:
  - Chemotherapy
  - Radiation therapy
  - Surgery
  - Stem cell transplant
- You may want to think about having your child take part in a clinical trial.
- Treatment for Ewing sarcoma may cause side effects.
- Follow-up care may be needed.

### Children with Ewing sarcoma should have their treatment planned by a team of health care providers who are experts in treating cancer in children.

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment of Ewing sarcoma. The pediatric oncologist works with other health care providers who are experts in treating children with Ewing sarcoma and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- surgical oncologist or orthopedic oncologist
- radiation oncologist
- pediatric nurse specialist
- social worker
- rehabilitation specialist
- psychologist
- fertility specialist

### There are different types of treatment for children with Ewing sarcoma.

You and your child's care team will work together to decide treatment. Many factors will be considered, such as where the cancer is located, your child's age and overall health, and whether the cancer is newly diagnosed or has come back.

Your child's treatment plan will include information about the tumor, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, visit our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

### The following types of treatment are used:

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cancer cells or stops them from dividing.

Chemotherapy for Ewing sarcoma is taken by mouth or injected into a vein. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body. Systemic combination chemotherapy is often given to shrink the tumor before surgery or radiation therapy and to kill any cancer cells that have spread to other parts of the body. It is often the first treatment given and lasts for about 6 to 12 months.

Chemotherapy drugs used alone or in combination to treat Ewing sarcoma include:

- cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide)
- docetaxel (https://www.cancer.gov/about-cancer/treatment/drugs/docetaxel)
- doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
- gemcitabine (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride)
- ifosfamide (https://www.cancer.gov/about-cancer/treatment/drugs/ifosfamide)
- irinotecan (https://www.cancer.gov/about-cancer/treatment/drugs/irinotecanhydrochloride)
- temozolomide (https://www.cancer.gov/about-cancer/treatment/drugs/temozolomide)
- topotecan (https://www.cancer.gov/about-cancer/treatment/drugs/topotecanhydrochloride)
- vincristine (https://www.cancer.gov/about-cancer/treatment/drugs/vincristinesulfate)

Other chemotherapy drugs not listed here may also be used.

Learn more about how chemotherapy works, how it is given, common side effects, and more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Ewing sarcoma is treated with external beam radiation therapy. This type of therapy uses a machine outside the body to send radiation toward the area of the body with cancer.

Radiation therapy is used when the tumor cannot be removed by surgery or when surgery to remove the tumor will affect important body functions or the way the child will look. It may be used to make the tumor smaller and decrease the amount of tissue that needs to be removed during surgery. It may also be used to treat any tumor that remains after surgery and tumors that have spread to other parts of the body.

Radiation therapy may also be used as palliative therapy to relieve symptoms caused by the tumor in the bone.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Surgery

Surgery is usually done to remove cancer that is left after chemotherapy or radiation therapy. When possible, the whole tumor is removed by surgery. Tissue and bone that are removed may be replaced with a graft, which uses tissue and bone taken from another part of the child's body or a donor. Sometimes an implant, such as artificial bone, is used.

After the doctor removes all the cancer that can be seen at the time of the surgery, some children may be given chemotherapy or radiation therapy to kill any cancer cells that are left. Treatment given after the surgery to lower the risk that the cancer will come back is called adjuvant therapy.

#### Stem cell transplant

High doses of chemotherapy are given to kill cancer cells. These treatments destroy healthy cells, including blood-forming cells. Stem cell transplant is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the child's blood or bone marrow and are frozen and stored. After the child completes chemotherapy, the stored stem cells are thawed and given back to the child through an infusion. These reinfused stem cells grow into (and restore) the body's blood cells. Stem cell transplant is used to treat localized and recurrent Ewing sarcoma.

### You may want to think about having your child take part in a clinical trial.

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for Ewing sarcoma may cause side effects.

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer), such as acute myeloid leukemia and myelodysplastic syndrome, or sarcoma in the areas treated with radiation therapy

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

### Follow-up care may be needed.

As your child goes through treatment, they will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

To learn more about these follow-up tests, visit Tests to diagnose Ewing sarcoma.

## Treatment of Localized Ewing Sarcoma

Treatments for newly diagnosed localized Ewing sarcoma include:

- chemotherapy
- surgery and/or radiation therapy
- stem cell transplant with the child's own cells

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Metastatic Ewing Sarcoma

Treatments for newly diagnosed metastatic Ewing sarcoma include:

- chemotherapy
- surgery
- radiation therapy

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Recurrent Ewing Sarcoma

Treatment of recurrent Ewing sarcoma may include:

- combination chemotherapy
- surgery
- radiation therapy to bone tumors, as palliative therapy to relieve symptoms and improve quality of life
- radiation therapy that may be followed by surgery to remove tumors that have spread to the lungs
- stem cell transplant with the child's own cells

Learn more about these treatments in the Treatment Option Overview.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Related resources

For more childhood cancer information and other general cancer resources, visit:

- Bone Cancer Home Page (https://www.cancer.gov/types/bone)
- Bone Cancer (https://www.cancer.gov/types/bone/bone-fact-sheet)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood Ewing sarcoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Ewing Sarcoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/bone/patient/ewing-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389350]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).